# Rhabdoid Tumor Predisposition Syndrome Type 1 (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics, cancer risks, and management of rhabdoid tumor predisposition syndrome type 1. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines for recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board and PDQ Cancer Genetics Editorial Board, which are editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Rhabdoid tumor predisposition syndrome type 1 (RTPS1) is caused by germline, or hereditary, heterozygous loss-of-function pathogenic variants in the SMARCB1 gene on chromosome 22q11.[1-3] Individuals with RTPS1 are at an increased risk of developing both central nervous system (CNS) and non-CNS rhabdoid tumors, including atypical teratoid/rhabdoid tumors (AT/RTs), malignant rhabdoid tumors (MRTs) of the kidney, and extrarenal rhabdoid tumors. These tumors tend to require multimodal treatment such as surgery, chemotherapy, and possibly radiation therapy. These tumors occur most frequently in early childhood, often before the age of 3 years.

### References

Sévenet N, Sheridan E, Amram D, et al.: Constitutional mutations of the hSNF5/INI1 gene predispose to a variety of cancers. Am J Hum Genet 65 (5): 1342-8, 1999.10521299 99452595
Biegel JA, Zhou JY, Rorke LB, et al.: Germ-line and acquired mutations of INI1 in atypical teratoid and rhabdoid tumors. Cancer Res 59 (1): 74-9, 1999.9892189 99107207
Versteege I, Sévenet N, Lange J, et al.: Truncating mutations of hSNF5/INI1 in aggressive paediatric cancer. Nature 394 (6689): 203-6, 1998.9671307 98334382

## Nomenclature

Individuals who harbor a germline pathogenic variant in SMARCB1 are said to have rhabdoid tumor predisposition syndrome type 1 (RTPS1).[1] Individuals who harbor a germline pathogenic variant in SMARCA4 are said to have rhabdoid tumor predisposition syndrome type 2 (RTPS2).[2] Nomenclature in genetic disorders continues to evolve, and future terminology for these disorders may reflect the proposed dyadic naming approach, incorporating both gene and phenotype.[3]

### References

Samples, Phenotypes and Ontologies Team: Rhabdoid Tumor Predisposition Syndrome 1. Ontology Lookup Service European Molecular Biology Laboratory-European Bioinformatics Institute (EMBL-EBI), 2023. Available online (http://purl.obolibrary.org/obo/MONDO_0012252). Last accessed October 17, 2023.
Samples, Phenotypes and Ontologies Team: Rhabdoid Tumor Predisposition Syndrome 2. Ontology Lookup Service European Molecular Biology Laboratory-European Bioinformatics Institute (EMBL-EBI), 2023. Available online (http://purl.obolibrary.org/obo/MONDO_0013224). Last accessed October 17, 2023.
Biesecker LG, Adam MP, Alkuraya FS, et al.: A dyadic approach to the delineation of diagnostic entities in clinical genomics. Am J Hum Genet 108 (1): 8-15, 2021.33417889

## Genetics

### Molecular Genetics

The SMARCB1 gene encodes the SMARCB1 protein (also called INI1 or BAF47), a member of the SWI/SNF chromatin remodeling complex, which helps control gene transcription.[1,2] Rhabdoid tumors develop when both copies of the SMARCB1 gene are inactivated, or in some cases, when both copies of the SMARCA4 gene are inactivated. Individuals with germline SMARCA4 variants have a diagnosis of rhabdoid tumor predisposition syndrome type 2. Loss of SMARCB1/INI1 expression (detected by immunohistochemistry) is included in the diagnostic criteria for rhabdoid tumors.[3]

In individuals with rhabdoid tumor predisposition syndrome type 1 (RTPS1), tumor development follows the Knudsen two-hit hypothesis. The first hit is caused by the inactivation of one copy of SMARCB1, typically by a truncating variant, copy-number change, or structural variant. The second hit is typically due to chromosomal deletion or loss of heterozygosity.[4] It is estimated that approximately 25% to 35% of rhabdoid tumor cases are associated with a germline variant in SMARCB1.[5-7] Higher rates have been reported in certain subgroups, including patients diagnosed at younger than 6 months (55%) and patients with multifocal tumors (78%).[8,9] It is recommended that all patients diagnosed with rhabdoid tumors consider genetic evaluation.[10] Whole- and partial-gene deletions, nonsense, and frameshift variants are seen most commonly, frequently affecting exons 2 through 7 of the SMARCB1 gene.[5,6,11] Single nucleotide variants, duplications, and splice-site variants occur more rarely.[5,11,12] A case of ring chromosome 22 has also been reported in an individual with RTPS1.[13]

### Inheritance

RTPS1 is inherited in an autosomal dominant manner. Penetrance is reported as greater than 90% for most types of truncating variants in SMARCB1.[7] However, these estimates are based on a modest number of observations and ascertainment of affected individuals and families. Most cases appear to be de novo, and individuals with rhabdoid tumors are often the first person in the family to be affected.[6,14,15] This may be due to the aggressive nature of rhabdoid tumors. However, incomplete penetrance and late-onset tumors, including schwannoma and meningioma, have been reported in a small subset of families who are unaffected by rhabdoid tumors and carry a germline SMARCB1 variant.[5,11] Gonadal mosaicism in a parent has been well documented in RTPS1. Therefore, negative genetic testing of parental blood cannot rule out the risk that more than one child may inherit the pathogenic variant and have a diagnosis of RTPS1.[5,6,11,16,17] Genetic counseling has been suggested to discuss topics like prenatal testing and potential reproductive recurrence risk relevant to gonadal mosaicism.[5,6]

### Related Disorders

Germline alterations in the SMARCB1 gene are primarily associated with two additional hereditary conditions, schwannomatosis and Coffin-Siris syndrome (CSS). Cases of schwannoma have been reported in RTPS1 kindreds. However, rhabdoid tumors have not been reported in individuals with CSS. Generally, SMARCB1 variants associated with CSS are missense variants that cluster in the first and last exons of the gene.[11] In patients with schwannomatosis, variants are often nontruncating and occur in the 3’ untranslated (UTR) region of SMARCB1.[18] However, nonsense SMARCB1 variants or deletions/duplications of the whole gene/multiple exons are more often associated with rhabdoid tumors.[11,18] While these patterns represent the common genotype-phenotype correlations, they are not final, and overlap can be seen. However, exon-spanning deletions appear to occur exclusively in patients with RTPS1.[11] While genotype-phenotype correlations exist across these three disorders, there is limited information regarding genotype-phenotype correlations specific to RTPS1.

### References

Roberts CW, Biegel JA: The role of SMARCB1/INI1 in development of rhabdoid tumor. Cancer Biol Ther 8 (5): 412-6, 2009.19305156
Reisman D, Glaros S, Thompson EA: The SWI/SNF complex and cancer. Oncogene 28 (14): 1653-68, 2009.19234488
Foulkes WD, Kamihara J, Evans DGR, et al.: Cancer Surveillance in Gorlin Syndrome and Rhabdoid Tumor Predisposition Syndrome. Clin Cancer Res 23 (12): e62-e67, 2017.28620006
Biegel JA, Zhou JY, Rorke LB, et al.: Germ-line and acquired mutations of INI1 in atypical teratoid and rhabdoid tumors. Cancer Res 59 (1): 74-9, 1999.9892189 99107207
Eaton KW, Tooke LS, Wainwright LM, et al.: Spectrum of SMARCB1/INI1 mutations in familial and sporadic rhabdoid tumors. Pediatr Blood Cancer 56 (1): 7-15, 2011.21108436
Bourdeaut F, Lequin D, Brugières L, et al.: Frequent hSNF5/INI1 germline mutations in patients with rhabdoid tumor. Clin Cancer Res 17 (1): 31-8, 2011.21208904
Frühwald MC, Nemes K, Boztug H, et al.: Current recommendations for clinical surveillance and genetic testing in rhabdoid tumor predisposition: a report from the SIOPE Host Genome Working Group. Fam Cancer 20 (4): 305-316, 2021.33532948
Nemes K, Johann PD, Steinbügl M, et al.: Infants and Newborns with Atypical Teratoid Rhabdoid Tumors (ATRT) and Extracranial Malignant Rhabdoid Tumors (eMRT) in the EU-RHAB Registry: A Unique and Challenging Population. Cancers (Basel) 14 (9): , 2022.35565313
Pinto EM, Hamideh D, Bahrami A, et al.: Malignant rhabdoid tumors originating within and outside the central nervous system are clinically and molecularly heterogeneous. Acta Neuropathol 136 (2): 315-326, 2018.29428974
Druker H, Zelley K, McGee RB, et al.: Genetic Counselor Recommendations for Cancer Predisposition Evaluation and Surveillance in the Pediatric Oncology Patient. Clin Cancer Res 23 (13): e91-e97, 2017.28674117
Holsten T, Bens S, Oyen F, et al.: Germline variants in SMARCB1 and other members of the BAF chromatin-remodeling complex across human disease entities: a meta-analysis. Eur J Hum Genet 26 (8): 1083-1093, 2018.29706634
Kordes U, Mautner VF, Oyen F, et al.: Evidence for a low-penetrant extended phenotype of rhabdoid tumor predisposition syndrome type 1 from a kindred with gain of SMARCB1 exon 6. Pediatr Blood Cancer 68 (10): e29185, 2021.34101994
Byers HM, Adam MP, LaCroix A, et al.: Description of a new oncogenic mechanism for atypical teratoid rhabdoid tumors in patients with ring chromosome 22. Am J Med Genet A 173 (1): 245-249, 2017.27734605
Biegel JA, Tan L, Zhang F, et al.: Alterations of the hSNF5/INI1 gene in central nervous system atypical teratoid/rhabdoid tumors and renal and extrarenal rhabdoid tumors. Clin Cancer Res 8 (11): 3461-7, 2002.12429635
Nemes K, Clément N, Kachanov D, et al.: The extraordinary challenge of treating patients with congenital rhabdoid tumors-a collaborative European effort. Pediatr Blood Cancer 65 (6): e26999, 2018.29418059
Gigante L, Paganini I, Frontali M, et al.: Rhabdoid tumor predisposition syndrome caused by SMARCB1 constitutional deletion: prenatal detection of new case of recurrence in siblings due to gonadal mosaicism. Fam Cancer 15 (1): 123-6, 2016.26342593
Bruggers CS, Bleyl SB, Pysher T, et al.: Clinicopathologic comparison of familial versus sporadic atypical teratoid/rhabdoid tumors (AT/RT) of the central nervous system. Pediatr Blood Cancer 56 (7): 1026-31, 2011.20848638
Smith MJ, Wallace AJ, Bowers NL, et al.: SMARCB1 mutations in schwannomatosis and genotype correlations with rhabdoid tumors. Cancer Genet 207 (9): 373-8, 2014.24933152

## Cancer Risks, Spectrum, and Characteristics

As a class, copy-number (deletion) and truncating variants in SMARCB1 are associated with increased risk of tumor predisposition, although there are no known SMARCB1 genotypes that can predict whether a tumor (or type of tumor) will develop.[1] A meta-analysis of 185 carriers of SMARCB1 variants found that the most common tumor type was atypical teratoid/rhabdoid tumors (AT/RTs), followed by rhabdoid tumors of the kidney and soft tissue.[1] Multifocal tumors were common. Other tumors found included meningiomas, malignant peripheral nerve sheath tumors, chondrosarcomas, epithelioid sarcomas, leiomyosarcomas, leiomyomas, and myoepitheliomas. Anatomical locations of the tumors varied, especially in the brain.[2] Tumors can also be synchronous or metachronous.

In patients with rhabdoid tumor predisposition syndrome type 1 (RTPS1), tumor onset typically occurs in very early childhood (often in infancy), and tumors may even be detected pre- or perinatally. There are rare case reports of adults developing SMARCB1-associated tumors. As next-generation sequencing of tumors has become more prevalent, alterations in the SMARCB1 gene may require investigation for an underlying germline predisposition. However, the absence of a genetic alteration in the SMARBC1 gene does not rule out an underlying cancer predisposition syndrome.[3] Second primary tumors have developed up to 15 years after the first primary tumor diagnosis, suggesting that lifetime surveillance is needed for patients with this syndrome.[4,5]

### References

Holsten T, Bens S, Oyen F, et al.: Germline variants in SMARCB1 and other members of the BAF chromatin-remodeling complex across human disease entities: a meta-analysis. Eur J Hum Genet 26 (8): 1083-1093, 2018.29706634
Nemes K, Johann PD, Steinbügl M, et al.: Infants and Newborns with Atypical Teratoid Rhabdoid Tumors (ATRT) and Extracranial Malignant Rhabdoid Tumors (eMRT) in the EU-RHAB Registry: A Unique and Challenging Population. Cancers (Basel) 14 (9): , 2022.35565313
Frühwald MC, Nemes K, Boztug H, et al.: Current recommendations for clinical surveillance and genetic testing in rhabdoid tumor predisposition: a report from the SIOPE Host Genome Working Group. Fam Cancer 20 (4): 305-316, 2021.33532948
Bruggers CS, Linscott L, Lee JC, et al.: Molecular characterization of metachronous atypical teratoid rhabdoid tumors occurring in a young man 15 years apart. Pediatr Blood Cancer 70 (1): e29836, 2023.35678633
Bhatt MD, Al-Karmi S, Druker H, et al.: Second rhabdoid tumor 8 years after treatment of atypical teratoid/rhabdoid tumor in a child with germline SMARCB1 mutation. Pediatr Blood Cancer 66 (3): e27546, 2019.30393974

## Management

### Genetic Counseling

Experts in the field of cancer genetics recommend a referral for genetic counseling or genetic evaluation for children who have been diagnosed with atypical teratoid/rhabdoid tumors (AT/RTs), malignant rhaboid tumors (MRTs), or any other SMARCB1-deficient tumors. These recommendations are based on the American Association for Cancer Research's (AACR) Childhood Cancer Predisposition Workshop and the European Society for Paediatric Oncology's (SIOPE) Host Genome Working Group guidelines.[1,2] In the event that a child with an AT/RT or MRT died before completing the evaluation, counseling may be provided to parents and siblings.

### Rhabdoid Tumor Predisposition and Fertility Preservation

Treatments for AT/RTs and MRTs may reduce fertility in boys and girls.[3,4] Therefore, the medical team may offer fertility preservation to these patients. Parents of children with AT/RTs and MRTs who undergo fertility preservation should be advised that if a germline SMARCB1 truncating variant is found, 50% of children derived from preserved gonadal tissue will inherit a SMARCB1 pathogenic variant and have a risk of developing rhabdoid tumors. Prenatal genetic counseling is advised for individuals with RTPS1.

### Outcomes and Treatment Modification

In patients with AT/RTs or extracranial rhabdoid tumors, germline SMARCB1 variants are associated with poor outcomes. The risk of metastasis may also be associated with a germline variant.[5,6] Despite intensive therapy, fewer than half of children with rhabdoid tumor predisposition syndrome type 1 (RTPS1) become long-term survivors. There are no data suggesting that treatment of patients with AT/RTs or MRTs should be modified because of a germline RTPS1 diagnosis.

For information about the treatment of AT/RTs, see Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment. For information about the treatment of MRTs, see the Rhabdoid Tumors of the Kidney section in Wilms Tumor and Other Childhood Kidney Tumors Treatment and the Rhabdoid Tumor NOS (Extrarenal) section in Childhood Soft Tissue Sarcoma Treatment.

### Surveillance

In 2017, a group of experts in childhood cancer genetics created the first recommendations for cancer surveillance for patients with RTPS1.[7] Since children with germline SMARCB1 truncating variants have an increased risk of developing AT/RTs in early childhood, screening recommendations include brain magnetic resonance imaging (MRI) every 3 months until age 5 years, after which surveillance ceases. Because of the risk of MRTs of the kidney, abdominal ultrasonography is recommended every 3 months from birth, with no upper age limit to stop surveillance. Whole-body MRI may also be considered until age 5 years. Screening is not recommended for children with a germline missense pathogenic variant in the SMARCB1 gene because the risk of tumor development is very low.

In 2021, the SIOPE Host Genome Working Group published guidelines for clinical surveillance and genetic testing in patients with RTPS1.[2] These guidelines recommend an age-based approach to surveillance. Central nervous system (CNS) and abdominal imaging occur every 1 to 3 months for patients younger than 6 months, every 2 to 3 months for patients aged 7 to 18 months, and every 3 months for patients aged 19 months to 5 years. Yearly whole-body MRI is recommended for patients aged 5 years and older.

### Surveillance in Survivorship

For children with tumors and SMARCB1 truncating variants, surveillance should be ongoing to detect primary disease recurrence. Survivors of AT/RTs will continue to require abdominal ultrasonography to screen for MRTs. Conversely, children with MRTs of the kidney will continue to undergo CNS surveillance for AT/RTs until age 5 years if they have a germline truncating variant in SMARCB1.[2]

Level of evidence: 5

### References

Druker H, Zelley K, McGee RB, et al.: Genetic Counselor Recommendations for Cancer Predisposition Evaluation and Surveillance in the Pediatric Oncology Patient. Clin Cancer Res 23 (13): e91-e97, 2017.28674117
Frühwald MC, Nemes K, Boztug H, et al.: Current recommendations for clinical surveillance and genetic testing in rhabdoid tumor predisposition: a report from the SIOPE Host Genome Working Group. Fam Cancer 20 (4): 305-316, 2021.33532948
Mulder RL, Font-Gonzalez A, Green DM, et al.: Fertility preservation for male patients with childhood, adolescent, and young adult cancer: recommendations from the PanCareLIFE Consortium and the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (2): e57-e67, 2021.33539754
Mulder RL, Font-Gonzalez A, Hudson MM, et al.: Fertility preservation for female patients with childhood, adolescent, and young adult cancer: recommendations from the PanCareLIFE Consortium and the International Late Effects of Childhood Cancer Guideline Harmonization Group. Lancet Oncol 22 (2): e45-e56, 2021.33539753
Reddy AT, Strother DR, Judkins AR, et al.: Efficacy of High-Dose Chemotherapy and Three-Dimensional Conformal Radiation for Atypical Teratoid/Rhabdoid Tumor: A Report From the Children's Oncology Group Trial ACNS0333. J Clin Oncol 38 (11): 1175-1185, 2020.32105509
Nemes K, Bens S, Kachanov D, et al.: Clinical and genetic risk factors define two risk groups of extracranial malignant rhabdoid tumours (eMRT/RTK). Eur J Cancer 142: 112-122, 2021.33249395
Foulkes WD, Kamihara J, Evans DGR, et al.: Cancer Surveillance in Gorlin Syndrome and Rhabdoid Tumor Predisposition Syndrome. Clin Cancer Res 23 (12): e62-e67, 2017.28620006

## Latest Updates to This Summary (11/05/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics) and the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics, cancer risks, and management of rhabdoid tumor predisposition syndrome type 1. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics) and the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which are editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Rhabdoid Tumor Predisposition Syndrome Type 1 are:

- Julia Meade, MD (UPMC Children's Hospital of Pittsburgh)
- Sarah Scollon, MS, CGC (Baylor College of Medicine & Texas Children's Hospital)
- Douglas Stewart, MD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board and the PDQ Pediatric Treatment Editorial Board use a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board and PDQ® Pediatric Treatment Editorial Board. PDQ Rhabdoid Tumor Predisposition Syndrome Type 1. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/rtps1-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38630976]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).